# Penile Cancer Treatment (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the treatment of penile cancer. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Adult Treatment Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## General Information About Penile Cancer

### Incidence and Mortality

Estimated new cases and deaths from penile (and other male genital) cancer in the United States in 2025:[1]

- New cases: 2,190.
- Deaths: 510.

### Risk Factors

Penile cancer is rare in most developed nations, including the United States, where the incidence rate is less than 1 per 100,000 men per year. Some studies suggest an association between human papillomavirus (HPV) infection and penile cancer.[2-5] Observational studies have shown a lower prevalence of penile HPV in men who have been circumcised (odds ratio, 0.37; 95% confidence interval, 0.16–0.85).[6] Some, but not all, observational studies also suggest that male newborn circumcision is associated with a decreased risk of penile cancer.[7,8] According to published data, if the relationship is causal, the number needed to treat was about 909 circumcisions to prevent a single case of invasive penile cancer.[9]

### Treatment Overview

When diagnosed early (stage 0, stage I, and stage II), penile cancer is highly curable. Curability decreases sharply for stage III and stage IV disease. Because of the rarity of this cancer in the United States, clinical trials specifically for penile cancer are infrequent. Patients with stage III and stage IV cancer are candidates for phase I and phase II clinical trials testing new drugs, biological therapy, or surgical techniques to improve local control and distant metastases.

The selection of treatment depends on the following tumor characteristics:[10,11]

- Size.
- Location.
- Invasiveness.
- Stage.

#### Fluorouracil dosing

The DPYD gene encodes an enzyme that catabolizes pyrimidines and fluoropyrimidines, like capecitabine and fluorouracil. An estimated 1% to 2% of the population has germline pathogenic variants in DPYD, which lead to reduced DPD protein function and an accumulation of pyrimidines and fluoropyrimidines in the body.[12,13] Patients with the DPYD*2A variant who receive fluoropyrimidines may experience severe, life-threatening toxicities that are sometimes fatal. Many other DPYD variants have been identified, with a range of clinical effects.[12-14] Fluoropyrimidine avoidance or a dose reduction of 50% may be recommended based on the patient's DPYD genotype and number of functioning DPYD alleles.[15-17] DPYD genetic testing costs less than $200, but insurance coverage varies due to a lack of national guidelines.[18] In addition, testing may delay therapy by 2 weeks, which would not be advisable in urgent situations. This controversial issue requires further evaluation.[19]

### References

American Cancer Society: Cancer Facts and Figures 2025. American Cancer Society, 2025. Available online (https://www.cancer.org/content/dam/cancer-org/research/cancer-facts-and-statistics/annual-cancer-facts-and-figures/2025/2025-cancer-facts-and-figures-acs.pdf). Last accessed January 16, 2025.
Del Mistro A, Chieco Bianchi L: HPV-related neoplasias in HIV-infected individuals. Eur J Cancer 37 (10): 1227-35, 2001.11423255 21315857
Griffiths TR, Mellon JK: Human papillomavirus and urological tumours: I. Basic science and role in penile cancer. BJU Int 84 (5): 579-86, 1999.10510097 99440191
Poblet E, Alfaro L, Fernander-Segoviano P, et al.: Human papillomavirus-associated penile squamous cell carcinoma in HIV-positive patients. Am J Surg Pathol 23 (9): 1119-23, 1999.10478673 99405778
Frisch M, van den Brule AJ, Jiwa NM, et al.: HPV-16-positive anal and penile carcinomas in a young man--anogenital 'field effect' in the immunosuppressed male? Scand J Infect Dis 28 (6): 629-32, 1996.9060069 97213304
Castellsagué X, Bosch FX, Muñoz N, et al.: Male circumcision, penile human papillomavirus infection, and cervical cancer in female partners. N Engl J Med 346 (15): 1105-12, 2002.11948269 21945851
Schoen EJ, Oehrli M, Colby C, et al.: The highly protective effect of newborn circumcision against invasive penile cancer. Pediatrics 105 (3): E36, 2000.10699138 20165351
Neonatal circumcision revisited. Fetus and Newborn Committee, Canadian Paediatric Society. CMAJ 154 (6): 769-80, 1996.8634956 96258155
Christakis DA, Harvey E, Zerr DM, et al.: A trade-off analysis of routine newborn circumcision. Pediatrics 105 (1 Pt 3): 246-9, 2000.10617731 20102811
Mark JR, Hurwitz M, Gomella LG: Cancer of the urethra and penis. In: DeVita VT Jr, Lawrence TS, Rosenberg SA: Cancer: Principles and Practice of Oncology. 11th ed. Wolters Kluwer Health, 2019, pp 1136-44.
Chao KS, Perez CA: Penis and male urethra. In: Perez CA, Brady LW, eds.: Principles and Practice of Radiation Oncology. 3rd ed. Lippincott-Raven Publishers, 1998, pp 1717-1732.
Sharma BB, Rai K, Blunt H, et al.: Pathogenic DPYD Variants and Treatment-Related Mortality in Patients Receiving Fluoropyrimidine Chemotherapy: A Systematic Review and Meta-Analysis. Oncologist 26 (12): 1008-1016, 2021.34506675
Lam SW, Guchelaar HJ, Boven E: The role of pharmacogenetics in capecitabine efficacy and toxicity. Cancer Treat Rev 50: 9-22, 2016.27569869
Shakeel F, Fang F, Kwon JW, et al.: Patients carrying DPYD variant alleles have increased risk of severe toxicity and related treatment modifications during fluoropyrimidine chemotherapy. Pharmacogenomics 22 (3): 145-155, 2021.33410339
Amstutz U, Henricks LM, Offer SM, et al.: Clinical Pharmacogenetics Implementation Consortium (CPIC) Guideline for Dihydropyrimidine Dehydrogenase Genotype and Fluoropyrimidine Dosing: 2017 Update. Clin Pharmacol Ther 103 (2): 210-216, 2018.29152729
Henricks LM, Lunenburg CATC, de Man FM, et al.: DPYD genotype-guided dose individualisation of fluoropyrimidine therapy in patients with cancer: a prospective safety analysis. Lancet Oncol 19 (11): 1459-1467, 2018.30348537
Lau-Min KS, Varughese LA, Nelson MN, et al.: Preemptive pharmacogenetic testing to guide chemotherapy dosing in patients with gastrointestinal malignancies: a qualitative study of barriers to implementation. BMC Cancer 22 (1): 47, 2022.34996412
Brooks GA, Tapp S, Daly AT, et al.: Cost-effectiveness of DPYD Genotyping Prior to Fluoropyrimidine-based Adjuvant Chemotherapy for Colon Cancer. Clin Colorectal Cancer 21 (3): e189-e195, 2022.35668003
Baker SD, Bates SE, Brooks GA, et al.: DPYD Testing: Time to Put Patient Safety First. J Clin Oncol 41 (15): 2701-2705, 2023.36821823

## Cellular Classification of Penile Cancer

Virtually all penile carcinomas are of squamous cell origin and include the following subtypes:

- Verrucous carcinoma.[1]
- Warty carcinoma (verruciform).[2]
- Basaloid carcinoma.[3]

Although they are less common subtypes, warty carcinoma and basaloid carcinoma appear to be more highly associated with human papillomaviruses (HPV), particularly HPV 16, than typical squamous cell carcinoma or verrucous carcinoma of the penis.[3-5]

Neuroendocrine carcinomas can also be seen.[6]

### References

Schwartz RA: Verrucous carcinoma of the skin and mucosa. J Am Acad Dermatol 32 (1): 1-21; quiz 22-4, 1995.7822496
Bezerra AL, Lopes A, Landman G, et al.: Clinicopathologic features and human papillomavirus dna prevalence of warty and squamous cell carcinoma of the penis. Am J Surg Pathol 25 (5): 673-8, 2001.11342782 21240070
Cubilla AL, Reuter VE, Gregoire L, et al.: Basaloid squamous cell carcinoma: a distinctive human papilloma virus-related penile neoplasm: a report of 20 cases. Am J Surg Pathol 22 (6): 755-61, 1998.9630184 98292136
Gregoire L, Cubilla AL, Reuter VE, et al.: Preferential association of human papillomavirus with high-grade histologic variants of penile-invasive squamous cell carcinoma. J Natl Cancer Inst 87 (22): 1705-9, 1995.7473819
Rubin MA, Kleter B, Zhou M, et al.: Detection and typing of human papillomavirus DNA in penile carcinoma: evidence for multiple independent pathways of penile carcinogenesis. Am J Pathol 159 (4): 1211-8, 2001.11583947
Vadmal MS, Steckel J, Teichberg S, et al.: Primary neuroendocrine carcinoma of the penile urethra. J Urol 157 (3): 956-7, 1997.9072615 97188843

## Stage Information for Penile Cancer

### American Joint Committee on Cancer (AJCC) Stage Groupings and Definitions of TNM

The AJCC has designated staging by TNM (tumor, node, metastasis) classification to define penile cancer.[1]

Definitions of TNM Stages 0is and 0a^a^

Stage | TNM | Description
0is | Tis, N0, M0 | Tis = Carcinoma in situ (PeIN).
0is | Tis, N0, M0 | N0 = cN0, no palpable or visibly enlarged inguinal lymph nodes; pN0, no lymph node metastasis.
0is | Tis, N0, M0 | M0 = No distant metastasis.
0a | Ta, N0, M0 | Ta = Noninvasive localized squamous cell carcinoma.
0a | Ta, N0, M0 | N0 = cN0, no palpable or visibly enlarged inguinal lymph nodes; pN0, no lymph node metastasis.
0a | Ta, N0, M0 | M0 = No distant metastasis.

T = primary tumor; N = regional lymph node; M = distant metastasis; cN = clinical N; PeIN = penile intraepithelial neoplasia; pN = pathological N.

^a^Reprinted with permission from AJCC: Penis. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp 701–14.

Definitions of TNM Stage I^a^

Stage | TNM | Description
I | T1a, N0, M0 | T1a = Tumor is without lymphovascular invasion or perineural invasion and is not high grade (i.e., grade 3 or sarcomatoid).
I | T1a, N0, M0 | N0 = cN0, no palpable or visibly enlarged inguinal lymph nodes; pN0, no lymph node metastasis.
I | T1a, N0, M0 | M0 = No distant metastasis.

T = primary tumor; N = regional lymph node; M = distant metastasis; cN = clinical N; pN = pathological N.

^a^Reprinted with permission from AJCC: Penis. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp 701–14.

Definitions of TNM Stages IIA and IIB^a^

Stage | TNM | Description
IIA | T1b, N0, M0 | T1b = Tumor exhibits lymphovascular invasion and/or perineural invasion or is high grade (i.e., grade 3 or sarcomatoid).
IIA | T1b, N0, M0 | N0 = cN0, no palpable or visibly enlarged inguinal lymph nodes; pN0, no lymph node metastasis.
IIA | T1b, N0, M0 | M0 = No distant metastasis.
IIA | T2, N0, M0 | T2 = Tumor invades into corpus spongiosum (either glans or ventral shaft) with or without urethral invasion.
IIA | T2, N0, M0 | N0 = cN0, no palpable or visibly enlarged inguinal lymph nodes; pN0, no lymph node metastasis.
IIA | T2, N0, M0 | M0 = No distant metastasis.
IIB | T3, N0, M0 | T3 = Tumor invades into corpora cavernosum (including tunica albuginea) with or without urethral invasion.
IIB | T3, N0, M0 | N0 = cN0, no palpable or visibly enlarged inguinal lymph nodes; pN0, no lymph node metastasis.
IIB | T3, N0, M0 | M0 = No distant metastasis.

T = primary tumor; N = regional lymph node; M = distant metastasis; cN = clinical N; pN = pathological N.

^a^Reprinted with permission from AJCC: Penis. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp 701–14.

Definitions of TNM Stages IIIA and IIIB^a^

Stage | TNM | Description
IIIA | T1–3, N1, M0 | T1 = Glans: Tumor invades lamina propria; Foreskin: Tumor invades dermis, lamina propria, or dartos fascia; Shaft: Tumor invades connective tissue between epidermis and corpora regardless of location; All sites with or without lymphovascular invasion or perineural invasion and is or is not high grade.
IIIA | T1–3, N1, M0 | –T1a = Tumor is without lymphovascular invasion or perineural invasion and is not high grade (i.e., grade 3 or sarcomatoid).
IIIA | T1–3, N1, M0 | –T1b = Tumor exhibits lymphovascular invasion and/or perineural invasion or is high grade (i.e., grade 3 or sarcomatoid).
IIIA | T1–3, N1, M0 | T2 = Tumor invades into corpus spongiosum (either glans or ventral shaft) with or without urethral invasion.
IIIA | T1–3, N1, M0 | T3 = Tumor invades into corpora cavernosum (including tunica albuginea) with or without urethral invasion.
IIIA | T1–3, N1, M0 | N1 = cN1, palpable mobile unilateral inguinal lymph node; pN1, ≤2 unilateral inguinal metastases, no ENE.
IIIA | T1–3, N1, M0 | M0 = No distant metastasis.
IIIB | T1–3, N2, M0 | T1 = Glans: Tumor invades lamina propria; Foreskin: Tumor invades dermis, lamina propria, or dartos fascia; Shaft: Tumor invades connective tissue between epidermis and corpora regardless of location; All sites with or without lymphovascular invasion or perineural invasion and is or is not high grade.
IIIB | T1–3, N2, M0 | –T1a = Tumor is without lymphovascular invasion or perineural invasion and is not high grade (i.e., grade 3 or sarcomatoid).
IIIB | T1–3, N2, M0 | –T1b = Tumor exhibits lymphovascular invasion and/or perineural invasion or is high grade (i.e., grade 3 or sarcomatoid).
IIIB | T1–3, N2, M0 | T2 = Tumor invades into corpus spongiosum (either glans or ventral shaft) with or without urethral invasion.
IIIB | T1–3, N2, M0 | T3 = Tumor invades into corpora cavernosum (including tunica albuginea) with or without urethral invasion.
IIIB | T1–3, N2, M0 | N2 = cN2, palpable mobile ≥ unilateral inguinal nodes or bilateral inguinal lymph nodes; pN2, ≥3 unilateral inguinal metastases or bilateral metastases, no ENE.
IIIB | T1–3, N2, M0 | M0 = No distant metastasis.

T = primary tumor; N = regional lymph node; M = distant metastasis; cN = clinical N; ENE = extranodal extension; pN = pathological N.

^a^Reprinted with permission from AJCC: Penis. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp 701–14.

Definitions of TNM Stage IV^a^

Stage | TNM | Description
IV | T4, Any N, M0 | T4 = Tumor invades into adjacent structures (i.e., scrotum, prostate, pubic bone).
IV | T4, Any N, M0 | cNX = Regional lymph nodes cannot be assessed.
IV | T4, Any N, M0 | cN0 = No palpable or visibly enlarged inguinal lymph nodes.
IV | T4, Any N, M0 | cN1 = Palpable mobile unilateral inguinal lymph node.
IV | T4, Any N, M0 | cN2 = Palpable mobile ≥ unilateral inguinal nodes or bilateral inguinal lymph nodes.
IV | T4, Any N, M0 | cN3 = Palpable fixed inguinal nodal mass or pelvic lymphadenopathy unilateral or bilateral.
IV | T4, Any N, M0 | pNX = Lymph node metastasis cannot be established.
IV | T4, Any N, M0 | pN0 = No lymph node metastasis.
IV | T4, Any N, M0 | pN1 = ≤2 unilateral inguinal metastases, no ENE.
IV | T4, Any N, M0 | pN2 = ≥3 unilateral inguinal metastases or bilateral metastases, no ENE.
IV | T4, Any N, M0 | pN3 = ENE of lymph node metastases or pelvic lymph node metastases.
IV | T4, Any N, M0 | M0 = No distant metastasis.
IV | Any T, N3, M0 | TX = Primary tumor cannot be assessed.
IV | Any T, N3, M0 | T0 = No evidence of primary tumor.
IV | Any T, N3, M0 | Tis = Carcinoma in situ (PeIN).
IV | Any T, N3, M0 | Ta = Noninvasive localized squamous cell carcinoma.
IV | Any T, N3, M0 | T1 = Glans: Tumor invades lamina propria; Foreskin: Tumor invades dermis, lamina propria, or dartos fascia; Shaft: Tumor invades connective tissue between epidermis and corpora regardless of location; All sites with or without lymphovascular invasion or perineural invasion and is or is not high grade.
IV | Any T, N3, M0 | –T1a = Tumor is without lymphovascular invasion or perineural invasion and is not high grade (i.e., grade 3 or sarcomatoid).
IV | Any T, N3, M0 | –T1b = Tumor exhibits lymphovascular invasion and/or perineural invasion or is high grade (i.e., grade 3 or sarcomatoid).
IV | Any T, N3, M0 | T2 = Tumor invades into corpus spongiosum (either glans or ventral shaft) with or without urethral invasion.
IV | Any T, N3, M0 | T3 = Tumor invades into corpora cavernosum (including tunica albuginea) with or without urethral invasion.
IV | Any T, N3, M0 | T4 = Tumor invades into adjacent structures (i.e., scrotum, prostate, pubic bone).
IV | Any T, N3, M0 | N3 = cN3, palpable fixed inguinal nodal mass or pelvic lymphadenopathy unilateral or bilateral; pN3, ENE of lymph node metastases or pelvic lymph node metastases.
IV | Any T, N3, M0 | M0 = No distant metastasis.
IV | Any T, Any N, M1 | Any T = See descriptions above in this table, stage IV, Any T, N3, M0.
IV | Any T, Any N, M1 | cNX = Regional lymph nodes cannot be assessed.
IV | Any T, Any N, M1 | cN0 = No palpable or visibly enlarged inguinal lymph nodes.
IV | Any T, Any N, M1 | cN1 = Palpable mobile unilateral inguinal lymph node.
IV | Any T, Any N, M1 | cN2 = Palpable mobile ≥2 unilateral inguinal nodes or bilateral inguinal lymph nodes.
IV | Any T, Any N, M1 | cN3 = Palpable fixed inguinal nodal mass or pelvic lymphadenopathy unilateral or bilateral.
IV | Any T, Any N, M1 | pNX = Lymph node metastasis cannot be established.
IV | Any T, Any N, M1 | pN0 = No lymph node metastasis.
IV | Any T, Any N, M1 | pN1 = ≤2 unilateral inguinal metastases, no ENE.
IV | Any T, Any N, M1 | pN2 = ≥3 unilateral inguinal metastases or bilateral metastases, no ENE.
IV | Any T, Any N, M1 | pN3 = ENE of lymph node metastases or pelvic lymph node metastases.
IV | Any T, Any N, M1 | M1 = Distant metastasis present.

T = primary tumor; N = regional lymph node; M = distant metastasis; cN = clinical N; ENE = extranodal extension; PeIN = penile intraepithelial neoplasia; pN = pathological N.

^a^Reprinted with permission from AJCC: Penis. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp 701–14.

### References

Penis. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. Springer; 2017, pp 701–14.

## Treatment of Stage 0 Penile Cancer

Stage 0 penile cancer is defined by the following TNM classifications:[1]

- Tis, N0, M0
- Ta, N0, M0

Carcinoma in situ of the penis is referred to as erythroplasia of Queyrat when it occurs on the glans, and Bowen disease when it occurs on the penile shaft. These precursor lesions progress to invasive squamous cell carcinoma in 5% to 15% of cases. In case series studies, human papillomavirus DNA has been detected in most of these lesions.[2,3] With no data from clinical trials in this disease stage, treatment recommendations are largely based on case reports and case series involving limited numbers of patients.

Treatment options:

1. Surgical excision can result in scarring, deformity, and impaired function. To minimize these effects, Mohs micrographic surgery, which involves the excision of successive horizontal layers of tissue with microscopic examination of each layer in frozen section, has been used in patients with in situ and invasive penile cancers.[4,5][Level of evidence C3]
2. Topical application of fluorouracil cream has been effective in cases of erythroplasia of Queyrat [6] and Bowen disease.[7][Level of evidence C3]
3. Imiquimod 5% cream is a topical immune response modifier that has been effective with good cosmetic and functional results.[8-10][Level of evidence C3]
4. Laser therapy with Nd:YAG or CO_2_ lasers has also resulted in excellent cosmetic results.[11][Level of evidence C3]
5. Cryosurgery has resulted in good cosmetic results in patients with erythroplasia of Queyrat and verrucous penile carcinoma.[12,13][Level of evidence C3]

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Penis. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. Springer; 2017, pp 701–14.
Cupp MR, Malek RS, Goellner JR, et al.: The detection of human papillomavirus deoxyribonucleic acid in intraepithelial, in situ, verrucous and invasive carcinoma of the penis. J Urol 154 (3): 1024-9, 1995.7637047
Rubin MA, Kleter B, Zhou M, et al.: Detection and typing of human papillomavirus DNA in penile carcinoma: evidence for multiple independent pathways of penile carcinogenesis. Am J Pathol 159 (4): 1211-8, 2001.11583947
Mohs FE, Snow SN, Messing EM, et al.: Microscopically controlled surgery in the treatment of carcinoma of the penis. J Urol 133 (6): 961-6, 1985.3999220 85211096
Moritz DL, Lynch WS: Extensive Bowen's disease of the penile shaft treated with fresh tissue Mohs micrographic surgery in two separate operations. J Dermatol Surg Oncol 17 (4): 374-8, 1991.2040751
Goette DK, Carson TE: Erythroplasia of Queyrat: treatment with topical 5-fluorouracil. Cancer 38 (4): 1498-502, 1976.991073
Tolia BM, Castro VL, Mouded IM, et al.: Bowen's disease of shaft of penis. Successful treatment with 5-fluorouracil. Urology 7 (6): 617-9, 1976.936382
Danielsen AG, Sand C, Weismann K: Treatment of Bowen's disease of the penis with imiquimod 5% cream. Clin Exp Dermatol 28 (Suppl 1): 7-9, 2003.14616803
Micali G, Nasca MR, Tedeschi A: Topical treatment of intraepithelial penile carcinoma with imiquimod. Clin Exp Dermatol 28 (Suppl 1): 4-6, 2003.14616802
Schroeder TL, Sengelmann RD: Squamous cell carcinoma in situ of the penis successfully treated with imiquimod 5% cream. J Am Acad Dermatol 46 (4): 545-8, 2002.11907505
van Bezooijen BP, Horenblas S, Meinhardt W, et al.: Laser therapy for carcinoma in situ of the penis. J Urol 166 (5): 1670-1, 2001.11586199
Michelman FA, Filho AC, Moraes AM: Verrucous carcinoma of the penis treated with cryosurgery. J Urol 168 (3): 1096-7, 2002.12187233
Sonnex TS, Ralfs IG, Plaza de Lanza M, et al.: Treatment of erythroplasia of Queyrat with liquid nitrogen cryosurgery. Br J Dermatol 106 (5): 581-4, 1982.7073983

## Treatment of Stage I Penile Cancer

Stage I penile cancer is defined by the following TNM classification:[1]

- T1a, N0, M0

Stage I penile cancer is curable.[2]

Treatment options:

1. For lesions limited to the foreskin, wide local excision with circumcision may be adequate therapy for control.
2. For infiltrating tumors of the glans with or without involvement of the adjacent skin, the choice of therapy is dictated by tumor size, extent of infiltration, and degree of tumor destruction of normal tissue. Equivalent therapeutic options include:
  - Penile amputation.[3]
  - Radiation therapy (i.e., external-beam radiation therapy and brachytherapy).[4,5]
  - Microscopically controlled surgery.[6]
3. Nd:YAG laser therapy has offered excellent control/cure with preservation of cosmetic appearance and sexual function (under clinical evaluation).[7,8]

Because of the high incidence of microscopic node metastases, elective adjunctive inguinal dissection of clinically uninvolved (negative) lymph nodes in conjunction with amputation is often used for patients with poorly differentiated tumors. Lymphadenectomy can carry substantial morbidity, such as infection, skin necrosis, wound breakdown, chronic edema, and even a low, but finite, mortality rate. The impact of prophylactic lymphadenectomy on survival is not known. For these reasons, opinions vary on its use.[9-12]

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Penis. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. Springer; 2017, pp 701–14.
Harty JI, Catalona WJ: Carcinoma of the penis. In: Javadpour N, ed.: Principles and Management of Urologic Cancer. 2nd ed. Williams and Wilkins, 1983, pp 581-597.
Lynch DF, Pettaway CA: Tumors of the penis. In: Walsh PC, Retik AB, Vaughan ED, et al., eds.: Campbell's Urology. 8th ed. Saunders, 2002, pp 2945-2947.
Chao KS, Perez CA: Penis and male urethra. In: Perez CA, Brady LW, eds.: Principles and Practice of Radiation Oncology. 3rd ed. Lippincott-Raven Publishers, 1998, pp 1717-1732.
McLean M, Akl AM, Warde P, et al.: The results of primary radiation therapy in the management of squamous cell carcinoma of the penis. Int J Radiat Oncol Biol Phys 25 (4): 623-8, 1993.8454480 93202967
Mohs FE, Snow SN, Messing EM, et al.: Microscopically controlled surgery in the treatment of carcinoma of the penis. J Urol 133 (6): 961-6, 1985.3999220 85211096
Smith JA Jr.: Lasers in clinical urologic surgery. In: Dixon JA, ed.: Surgical Application of Lasers. 2nd ed. Year Book Medical Publishers, Inc., 1987, pp 218-237.
Horenblas S, van Tinteren H, Delemarre JF, et al.: Squamous cell carcinoma of the penis. II. Treatment of the primary tumor. J Urol 147 (6): 1533-8, 1992.1593683 92277742
Theodorescu D, Russo P, Zhang ZF, et al.: Outcomes of initial surveillance of invasive squamous cell carcinoma of the penis and negative nodes. J Urol 155 (5): 1626-31, 1996.8627839 96186040
Lindegaard JC, Nielsen OS, Lundbeck FA, et al.: A retrospective analysis of 82 cases of cancer of the penis. Br J Urol 77 (6): 883-90, 1996.8705227 96334886
Ornellas AA, Seixas AL, Marota A, et al.: Surgical treatment of invasive squamous cell carcinoma of the penis: retrospective analysis of 350 cases. J Urol 151 (5): 1244-9, 1994.7512656 94210622
Young MJ, Reda DJ, Waters WB: Penile carcinoma: a twenty-five-year experience. Urology 38 (6): 529-32, 1991.1746081 92081133

## Treatment of Stage II Penile Cancer

Stage II penile cancer is defined by the following TNM classifications:[1]

- T1b, N0, M0
- T2, N0, M0
- T3, N0, M0

Treatment options:

1. Stage II penile cancer is most frequently managed by penile amputation for local control. Whether the amputation is partial, total, or radical will depend on the extent and location of the neoplasm. External-beam radiation therapy and brachytherapy with surgical salvage are alternative approaches.[2-6]
2. Nd:YAG laser therapy has been used to preserve the penis in selected patients with small lesions (under clinical evaluation).[7]

Because of the high incidence of microscopic node metastases, elective adjunctive dissection of clinically uninvolved (negative) lymph nodes in conjunction with amputation is often used for patients with poorly differentiated tumors. Lymphadenectomy can carry substantial morbidity, such as infection, skin necrosis, wound breakdown, chronic edema, and even a low, but finite, mortality rate. The impact of prophylactic lymphadenectomy on survival is not known.[8-11]

To reduce the morbidity associated with prophylactic lymphadenectomy, dynamic sentinel node biopsy is used in patients with stage T2 clinically node-negative penile cancer. One retrospective, single-institution study of 22 patients reported a false-negative rate of 11%.[12]

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Penis. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. Springer; 2017, pp 701–14.
Harty JI, Catalona WJ: Carcinoma of the penis. In: Javadpour N, ed.: Principles and Management of Urologic Cancer. 2nd ed. Williams and Wilkins, 1983, pp 581-597.
Schellhammer PF, Spaulding JT: Carcinoma of the penis. In: Paulson DF, ed.: Genitourinary Surgery. Vol. 2. Churchill Livingston, 1984, pp 629-654.
Johnson DE, Lo RK: Tumors of the penis, urethra, and scrotum. In: deKernion JB, Paulson DF, eds.: Genitourinary Cancer Management. Lea and Febiger, 1987, pp 219-258.
McLean M, Akl AM, Warde P, et al.: The results of primary radiation therapy in the management of squamous cell carcinoma of the penis. Int J Radiat Oncol Biol Phys 25 (4): 623-8, 1993.8454480 93202967
Crook JM, Jezioranski J, Grimard L, et al.: Penile brachytherapy: results for 49 patients. Int J Radiat Oncol Biol Phys 62 (2): 460-7, 2005.15890588
Horenblas S, van Tinteren H, Delemarre JF, et al.: Squamous cell carcinoma of the penis. II. Treatment of the primary tumor. J Urol 147 (6): 1533-8, 1992.1593683 92277742
Theodorescu D, Russo P, Zhang ZF, et al.: Outcomes of initial surveillance of invasive squamous cell carcinoma of the penis and negative nodes. J Urol 155 (5): 1626-31, 1996.8627839 96186040
Lindegaard JC, Nielsen OS, Lundbeck FA, et al.: A retrospective analysis of 82 cases of cancer of the penis. Br J Urol 77 (6): 883-90, 1996.8705227 96334886
Ornellas AA, Seixas AL, Marota A, et al.: Surgical treatment of invasive squamous cell carcinoma of the penis: retrospective analysis of 350 cases. J Urol 151 (5): 1244-9, 1994.7512656 94210622
Young MJ, Reda DJ, Waters WB: Penile carcinoma: a twenty-five-year experience. Urology 38 (6): 529-32, 1991.1746081 92081133
Perdonà S, Autorino R, De Sio M, et al.: Dynamic sentinel node biopsy in clinically node-negative penile cancer versus radical inguinal lymphadenectomy: a comparative study. Urology 66 (6): 1282-6, 2005.16360457

## Treatment of Stage III Penile Cancer

Stage III penile cancer is defined by the following TNM classifications:[1]

- T1–3, N1, M0
- T1–3, N2, M0

Inguinal adenopathy in patients with penile cancer is common but may be the result of infection rather than neoplasm. If palpable enlarged lymph nodes exist 3 or more weeks after removal of the infected primary lesion and completion of a course of antibiotic therapy, bilateral inguinal lymph node dissection should be performed.

In cases of proven regional inguinal lymph node metastasis without evidence of distant spread, bilateral ilioinguinal dissection is the treatment of choice.[2-5] Because many patients with positive lymph nodes are not cured, clinical trials may be appropriate.

Treatment options:

1. Clinically evident regional lymph node metastasis without evidence of distant spread is an indication for bilateral ilioinguinal lymph node dissection after penile amputation.[6]
2. Radiation therapy may be considered as an alternative to lymph node dissection in patients who are not surgical candidates.
3. Postoperative radiation therapy may decrease incidence of inguinal recurrences.
4. Clinical trials using radiosensitizers or cytotoxic drugs are appropriate. A combination of vincristine, bleomycin, and methotrexate has been effective as both neoadjuvant and adjuvant therapy.[7] Cisplatin (100 mg/m²) as neoadjuvant therapy plus continuous-infusion fluorouracil has also been effective.[6] Single-agent cisplatin (50 mg/m^2^) was tested in a large trial and was ineffective.[8]

Because of the high incidence of microscopic node metastases, adjunctive inguinal dissection of clinically uninvolved (negative) lymph nodes in conjunction with amputation is often used for patients with poorly differentiated tumors. Lymphadenectomy can carry substantial morbidity, such as infection, skin necrosis, wound breakdown, chronic edema, and even a low, but finite, mortality rate. The impact of prophylactic lymphadenectomy on survival is not known. [3,4,9,10]

To reduce the morbidity associated with prophylactic lymphadenectomy, dynamic sentinel node biopsy is used in patients with stage T2 and stage T3 clinically node-negative penile cancer. One retrospective, single-institution study of 22 patients reported a false-negative rate of 11%.[11]

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Penis. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. Springer; 2017, pp 701–14.
Harty JI, Catalona WJ: Carcinoma of the penis. In: Javadpour N, ed.: Principles and Management of Urologic Cancer. 2nd ed. Williams and Wilkins, 1983, pp 581-597.
Theodorescu D, Russo P, Zhang ZF, et al.: Outcomes of initial surveillance of invasive squamous cell carcinoma of the penis and negative nodes. J Urol 155 (5): 1626-31, 1996.8627839 96186040
Lindegaard JC, Nielsen OS, Lundbeck FA, et al.: A retrospective analysis of 82 cases of cancer of the penis. Br J Urol 77 (6): 883-90, 1996.8705227 96334886
Lynch DF, Pettaway CA: Tumors of the penis. In: Walsh PC, Retik AB, Vaughan ED, et al., eds.: Campbell's Urology. 8th ed. Saunders, 2002, pp 2945-2947.
Fisher HA, Barada JH, Horton J, et al.: Neoadjuvant therapy with cisplatin and 5-fluorouracil for stage III squamous cell carcinoma of the penis. [Abstract] J Urol 143(4 Suppl): A-653, 352A, 1990.
Pizzocaro G, Piva L: Adjuvant and neoadjuvant vincristine, bleomycin, and methotrexate for inguinal metastases from squamous cell carcinoma of the penis. Acta Oncol 27 (6b): 823-4, 1988.2466471 89166200
Gagliano RG, Blumenstein BA, Crawford ED, et al.: cis-Diamminedichloroplatinum in the treatment of advanced epidermoid carcinoma of the penis: a Southwest Oncology Group Study. J Urol 141 (1): 66-7, 1989.2642312 89068929
Ornellas AA, Seixas AL, Marota A, et al.: Surgical treatment of invasive squamous cell carcinoma of the penis: retrospective analysis of 350 cases. J Urol 151 (5): 1244-9, 1994.7512656 94210622
Young MJ, Reda DJ, Waters WB: Penile carcinoma: a twenty-five-year experience. Urology 38 (6): 529-32, 1991.1746081 92081133
Perdonà S, Autorino R, De Sio M, et al.: Dynamic sentinel node biopsy in clinically node-negative penile cancer versus radical inguinal lymphadenectomy: a comparative study. Urology 66 (6): 1282-6, 2005.16360457

## Treatment of Stage IV Penile Cancer

Stage IV penile cancer is defined by the following TNM classifications:[1]

- T4, Any N, M0
- Any T, N3, M0
- Any T, Any N, M1

No standard treatment exists that is curative for patients with stage IV penile cancer. Therapy is directed at palliation, which may be achieved either with surgery or radiation therapy.

Treatment options:

1. Palliative surgery may be considered for control of the local penile lesion and even for the prevention of the necrosis, infection, and hemorrhage that can result from neglected regional adenopathy.
2. Radiation therapy may be palliative for the primary tumor, regional adenopathy, and bone metastases.
3. Clinical trials combining chemotherapy with palliative methods of local control are appropriate. Tested chemotherapeutic drugs with some efficacy include vincristine, cisplatin, methotrexate, and bleomycin. The combination of vincristine, bleomycin, and methotrexate has been effective both as adjuvant and neoadjuvant therapy.[2]

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Penis. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. Springer; 2017, pp 701–14.
Pizzocaro G, Piva L: Adjuvant and neoadjuvant vincristine, bleomycin, and methotrexate for inguinal metastases from squamous cell carcinoma of the penis. Acta Oncol 27 (6b): 823-4, 1988.2466471 89166200

## Treatment of Recurrent Penile Cancer

Patients with locally recurrent disease can be treated with surgery or radiation therapy. If the initial treatment of radiation therapy fails, patients often undergo penile amputation. Patients with nodal recurrences not controlled by local measures are candidates for phase I and phase II clinical trials testing new biological and chemotherapeutic agents.[1-5]

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Pizzocaro G, Piva L: Adjuvant and neoadjuvant vincristine, bleomycin, and methotrexate for inguinal metastases from squamous cell carcinoma of the penis. Acta Oncol 27 (6b): 823-4, 1988.2466471 89166200
Ahmed T, Sklaroff R, Yagoda A: Sequential trials of methotrexate, cisplatin and bleomycin for penile cancer. J Urol 132 (3): 465-8, 1984.6206239 84292484
Dexeus FH, Logothetis CJ, Sella A, et al.: Combination chemotherapy with methotrexate, bleomycin and cisplatin for advanced squamous cell carcinoma of the male genital tract. J Urol 146 (5): 1284-7, 1991.1719241 92046406
Fisher HA, Barada JH, Horton J, et al.: Neoadjuvant therapy with cisplatin and 5-fluorouracil for stage III squamous cell carcinoma of the penis. [Abstract] J Urol 143(4 Suppl): A-653, 352A, 1990.
Hussein AM, Benedetto P, Sridhar KS: Chemotherapy with cisplatin and 5-fluorouracil for penile and urethral squamous cell carcinomas. Cancer 65 (3): 433-8, 1990.2297633 90124109

## Latest Updates to This Summary (05/07/2025)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Editorial changes were made to this summary.

This summary is written and maintained by the PDQ Adult Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/adult-treatment), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the treatment of penile cancer. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Adult Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/adult-treatment), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

The lead reviewers for Penile Cancer Treatment are:

- Juskaran S. Chadha, DO (Moffitt Cancer Center)
- Jad Chahoud, MD, MPH (Moffitt Cancer Center)
- Timothy Gilligan, MD (Cleveland Clinic Taussig Cancer Institute)

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Adult Treatment Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Adult Treatment Editorial Board. PDQ Penile Cancer Treatment. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/penile/hp/penile-treatment-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389381]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

Based on the strength of the available evidence, treatment options may be described as either “standard” or “under clinical evaluation.” These classifications should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).